# Melanoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of melanoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Melanoma

Key Points for This Section
- Melanoma is a disease in which malignant (cancer) cells form in melanocytes (cells that color the skin).
- There are different types of cancer that start in the skin.
- Melanoma can occur anywhere on the skin.
- Unusual moles, exposure to sunlight, and health history can affect the risk of melanoma.
- Signs of melanoma include a change in the way a mole or pigmented area looks.
- Tests that examine the skin are used to diagnose melanoma.
- After melanoma has been diagnosed, tests may be done to find out if cancer cells have spread within the skin or to other parts of the body.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Melanoma is a disease in which malignant (cancer) cells form in melanocytes (cells that color the skin).

The skin is the body's largest organ. It protects against heat, sunlight, injury, and infection. Skin also helps control body temperature and stores water, fat, and vitamin D. The skin has several layers, but the two main layers are the epidermis (upper or outer layer) and the dermis (lower or inner layer). Skin cancer begins in the epidermis, which is made up of three kinds of cells:

- Squamous cells: Thin, flat cells that form the top layer of the epidermis.
- Basal cells: Round cells under the squamous cells.
- Melanocytes: Cells that make melanin and are found in the lower part of the epidermis. Melanin is the pigment that gives skin its natural color. When skin is exposed to the sun or artificial light, melanocytes make more pigment and cause the skin to darken.

Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue. Melanocytes are in the layer of basal cells at the deepest part of the epidermis.

Anatomy of the skin with melanocytes; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis above the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.

### There are different types of cancer that start in the skin.

There are two main forms of skin cancer: melanoma and nonmelanoma.

Melanoma is a rare form of skin cancer. It is more likely to invade nearby tissues and spread to other parts of the body than other types of skin cancer. When melanoma starts in the skin, it is called cutaneous melanoma. Melanoma may also occur in mucous membranes (thin, moist layers of tissue that cover surfaces such as the lips). This summary is about cutaneous (skin) melanoma and melanoma that affects the mucous membranes.

Before age 50, rates of melanoma are higher in women than in men. After age 50, rates of melanoma are much higher in men. Melanoma is most common in adults, but it is sometimes found in children and adolescents. Learn more about Childhood Melanoma Treatment.

The most common types of skin cancer are basal cell carcinoma and squamous cell carcinoma. They are nonmelanoma skin cancers. Nonmelanoma skin cancers rarely spread to other parts of the body. Learn more about Skin Cancer Treatment.

### Melanoma can occur anywhere on the skin.

In men, melanoma is often found on the trunk (the area from the shoulders to the hips) or the head and neck. In women, melanoma forms most often on the arms and legs.

When melanoma occurs in the eye, it is called intraocular or ocular melanoma. Learn more about Intraocular (Uveal) Melanoma Treatment.

### Unusual moles, exposure to sunlight, and health history can affect the risk of melanoma.

A risk factor is anything that increases the chance of getting a disease. Some risk factors for melanoma, such as tanning bed use, can be changed. However, risk factors also include things people cannot change, like their genetics and their family history. Learning about risk factors for melanoma can help you make changes that might lower your risk of getting it.

Risk factors for melanoma include:

- having a fair complexion, which includes:
  - fair skin that freckles and burns easily, does not tan, or tans poorly
  - blue or green or other light-colored eyes
  - red or blond hair
- being exposed to natural sunlight or artificial sunlight (such as from tanning beds)
- being exposed to certain factors, such as radiation, solvents, vinyl chloride, and PCBs, in the environment (the air, your home or workplace, and your food and water)
- having a history of many blistering sunburns, especially as a child or teenager
- having several large or many small moles
- having a family history of unusual moles (atypical nevus syndrome)
- having a family or personal history of melanoma
- being White
- having a weakened immune system
- having certain changes in the genes that are linked to melanoma

Being White or having a fair complexion increases the risk of melanoma, but anyone can have melanoma, including people with dark skin.

Learn more about risk factors for melanoma at Genetics of Skin Cancer and Skin Cancer Prevention.

### Signs of melanoma include a change in the way a mole or pigmented area looks.

These and other signs and symptoms may be caused by melanoma or by other conditions. Check with your doctor if you have:

- a mole that:
  - changes in size, shape, or color
  - has irregular edges or borders
  - is more than one color
  - is asymmetrical (if the mole is divided in half, the 2 halves are different in size or shape)
  - itches
  - oozes, bleeds, or is ulcerated (a hole forms in the skin when the top layer of cells breaks down and the tissue below shows through)
- a change in pigmented (colored) skin
- satellite moles (new moles that grow near an existing mole)

The acronym ABCDE can help you remember the signs of melanoma:

- Asymmetrical
- Border
- Color
- Diameter (melanoma is usually larger than 6 millimeters)
- Evolving (the mole changes in size, shape, or color over time

Find pictures and descriptions of common moles and melanoma at Common Moles, Dysplastic Nevi, and Risk of Melanoma (https://www.cancer.gov/types/skin/moles-fact-sheet).

### Tests that examine the skin are used to diagnose melanoma.

Melanoma is usually diagnosed with tests that examine the skin. The process used to find out if cancer cells have spread beyond the skin is called staging. To plan treatment, it is important to know the stage of the disease.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures to find and diagnose melanoma:

- Skin exam is an exam where a doctor or nurse checks the skin for moles, birthmarks, or other pigmented areas that look abnormal in color, size, shape, or texture.
- Biopsy is the removal of cells or tissues so they can be viewed under a microscope to check for signs of cancer. It can be hard to tell the difference between a colored mole and an early melanoma lesion. Patients may want to have the sample of tissue checked by a second pathologist. If the abnormal mole or lesion is cancer, the sample of tissue may also be tested for certain gene changes. This may help to plan treatment. Learn about the type of information that can be found in a pathologist's report about the cells or tissue removed during a biopsy at Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).
  There are four main types of skin biopsies. The type of biopsy done depends on where the abnormal area formed and the size of the area.
  - Shave biopsy uses a sterile razor blade to "shave off" the growth.
  - Punch biopsy uses a special instrument called a punch or a trephine to remove a circle of tissue from the growth.
    Punch biopsy. A sharp, hollow, circular instrument is used to remove a small, round piece of tissue from a lesion on the skin. The instrument is turned clockwise and counterclockwise to cut about 4 millimeters (mm) down to the layer of fatty tissue below the skin and remove the sample of tissue. Skin thickness is different on different parts of the body.
    Punch biopsy; drawing shows a sharp, hollow, circular instrument being inserted into a lesion on the skin of a patient’s forearm. The instrument is turned clockwise and counterclockwise to cut into the skin and remove a small, round piece of tissue. A pullout shows that the instrument cuts about 4 millimeters (mm) down to the layer of fatty tissue below the skin.
  - Incisional biopsy uses a scalpel to remove part of a growth.
  - Excisional biopsy uses a scalpel to remove the entire growth.

### After melanoma has been diagnosed, tests may be done to find out if cancer cells have spread within the skin or to other parts of the body.

The process used to find out whether cancer has spread within the skin or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment.

For melanoma that is not likely to spread to other parts of the body or recur, more tests may not be needed. For melanoma that is likely to spread to other parts of the body or recur, the following tests and procedures may be done after surgery to remove the melanoma:

- Lymph node mapping and sentinel lymph node biopsy includes the removal of the sentinel lymph node during surgery. The sentinel lymph node is the first lymph node in a group of lymph nodes to receive lymphatic drainage from the primary tumor. It is the first lymph node the cancer is likely to spread to from the primary tumor. A radioactive substance or blue dye is injected near the tumor. The substance or dye flows through the lymph ducts to the lymph nodes. The first lymph node to receive the substance or dye is removed. A pathologist views the tissue under a microscope to look for cancer cells. If cancer cells are not found, it may not be necessary to remove more lymph nodes. Sometimes, a sentinel lymph node is found in more than one group of nodes.
- CT scan (CAT scan) is a procedure that makes a series of detailed pictures of areas inside the body taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. For melanoma, pictures may be taken of the neck, chest, abdomen, and pelvis.
- PET scan (positron emission tomography scan) is a procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
- MRI (magnetic resonance imaging) with gadolinium is a procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the brain. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Ultrasound exam is a procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues, such as lymph nodes, or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.
- Blood chemistry studies is a procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. For melanoma, the blood is checked for an enzyme called lactate dehydrogenase (LDH). High LDH levels may predict a poor response to treatment in people with metastatic disease.

The results of these tests are viewed together with the results of the tumor biopsy to find out the stage of the melanoma.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your melanoma diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- the thickness of the tumor and where it is in the body
- whether there was bleeding or ulceration of the tumor
- how much cancer is in the lymph nodes
- the number of places and where cancer has spread to in the body
- the level of lactate dehydrogenase (LDH) in the blood
- whether the cancer has certain mutations (changes) in a gene called BRAF
- your age and general health

## Stages of Melanoma

Key Points for This Section
- The stage of melanoma depends on the thickness of the tumor, whether cancer has spread to lymph nodes or other parts of the body, and other factors.
- The following stages are used for melanoma:
  - Stage 0 (melanoma in situ)
  - Stage I (also called stage 1) melanoma
  - Stage II (also called stage 2) melanoma
  - Stage III (also called stage 3) melanoma
  - Stage IV (also called stage 4) melanoma
- Melanoma can recur (come back) after it has been treated.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the melanoma stage to plan treatment.

There are several staging systems for cancer that describe the extent of the cancer. Melanoma staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn about tests to stage melanoma. Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The stage of melanoma depends on the thickness of the tumor, whether cancer has spread to lymph nodes or other parts of the body, and other factors.

To find out the stage of melanoma, the tumor is completely removed and nearby lymph nodes are checked for signs of cancer. The stage of the cancer is used to determine which treatment is best. Check with your doctor to find out which stage of cancer you have.

The stage of melanoma depends on:

- The tumor's thickness, which is measured from the surface of the skin to the deepest part of the tumor.
  Melanoma staging (tumor thickness); drawing shows different depths of cancer invasion (0, 1.0, 2.0, 3.0, 4.0, and 5.0 mm) into the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
- Whether the tumor is ulcerated (has broken through the skin).
  Melanoma staging (tumor ulceration); drawing shows a tumor that is ulcerated (has broken through the skin) and a tumor that is not ulcerated.
- Whether cancer is found in lymph nodes by a physical exam, imaging tests, or a sentinel lymph node biopsy.
  Melanoma staging (lymph node involvement); drawing shows cancer that has spread from the primary tumor to the lymph nodes.
- Whether the lymph nodes are matted (joined together).
  Melanoma staging (matted lymph nodes); drawing shows matted lymph nodes with cancer.
- Whether there are:
  - Satellite tumors: Small groups of tumor cells that have spread within 2 centimeters of the primary tumor.
  - Microsatellite tumors: Small groups of tumor cells that have spread to an area right beside or below the primary tumor.
  - In-transit metastases: Tumors that have spread to lymph vessels in the skin more than 2 centimeters away from the primary tumor, but not to the lymph nodes.
  Melanoma staging (in-transit metastases, satellite tumors, and microsatellite tumors); drawing shows in-transit metastases in a lymph vessel more than 2 centimeters away from the primary tumor and satellite tumors within 2 centimeters of the primary tumor. Microsatellite tumors are not shown because they can only be seen with a microscope.
- Whether the cancer has spread to other parts of the body, such as the lung, liver, brain, soft tissue (including muscle), digestive tract, and/or distant lymph nodes.
  Melanoma staging (cancer spread to other parts of the body); drawing shows cancer cells spreading from the primary cancer, through the blood and lymph system, to another part of the body where a metastatic tumor has formed.

### The following stages are used for melanoma:

#### Stage 0 (melanoma in situ)

In stage 0, abnormal melanocytes are found in the epidermis. These abnormal melanocytes may become cancer and spread into nearby normal tissue. Stage 0 is also called melanoma in situ.

Stage 0 melanoma. Abnormal melanocytes are found in the epidermis (outer layer of the skin). These abnormal melanocytes may become cancer and spread into nearby normal tissue.

Stage 0 melanoma; drawing shows an abnormal area on the surface of the skin and abnormal melanocytes in the epidermis (outer layer of the skin). Also shown are the dermis (inner layer of the skin) and the subcutaneous tissue below the dermis.

#### Stage I (also called stage 1) melanoma

In stage I, cancer has formed. Stage I is divided into stages IA and IB.

Millimeters (mm). A sharp pencil point is about 1 mm, a new crayon point is about 2 mm, and a new pencil eraser is about 5 mm.

Millimeters; drawing shows millimeters (mm) using everyday objects. A sharp pencil point shows 1 mm, a new crayon point shows 2 mm, and a new pencil-top eraser shows 5 mm.

- Stage IA: The tumor is not more than 1 millimeter thick, with or without ulceration.
- Stage IB: The tumor is more than 1 but not more than 2 millimeters thick, without ulceration.
  Stage I melanoma. In stage IA, the tumor is not more than 1 millimeter thick, with or without ulceration (a break in the skin). In stage IB, the tumor is more than 1 but not more than 2 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
  Two-panel drawing of stage I melanoma; the panel on the left shows a stage IA tumor that is not more than 1 millimeter thick, with ulceration (a break in the skin) and without ulceration. The panel on the right shows a stage IB tumor that is more than 1 but not more than 2 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.

#### Stage II (also called stage 2) melanoma

Stage II is divided into stages IIA, IIB, and IIC.

- Stage IIA: The tumor is either:
  - more than 1 but not more than 2 millimeters thick, with ulceration; or
  - more than 2 but not more than 4 millimeters thick, without ulceration.
    Stage IIA melanoma. The tumor is more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin); OR it is more than 2 but not more than 4 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
    Two-panel drawing of stage IIA melanoma; the panel on the left shows a tumor that is more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin). The panel on the right shows a tumor that is more than 2 but not more than 4 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
- Stage IIB: The tumor is either:
  - more than 2 but not more than 4 millimeters thick, with ulceration; or
  - more than 4 millimeters thick, without ulceration.
    Stage IIB melanoma. The tumor is more than 2 but not more than 4 millimeters thick, with ulceration (a break in the skin); OR it is more than 4 millimeters thick, without ulceration. Skin thickness is different on different parts of the body.
    Two-panel drawing of stage IIB melanoma; the panel on the left shows a tumor that is more than 2 but not more than 4 millimeters thick, with ulceration (a break in the skin). There is also an inset that shows 2 millimeters is about the size of a new crayon point and 5 millimeters is about the size of a pencil-top eraser. The panel on the right shows a tumor that is more than 4 millimeters thick, without ulceration. There is also an inset that shows 5 millimeters is about the size of a pencil-top eraser. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
- Stage IIC: The tumor is more than 4 millimeters thick, with ulceration.
  Stage IIC melanoma. The tumor is more than 4 millimeters thick, with ulceration (a break in the skin). Skin thickness is different on different parts of the body.
  Stage IIC melanoma; drawing shows a tumor that is more than 4 millimeters thick, with ulceration (a break in the skin). Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.

#### Stage III (also called stage 3) melanoma

Stage III is divided into stages IIIA, IIIB, IIIC, and IIID.

- Stage IIIA: The tumor is not more than 1 millimeter thick, with ulceration, or not more than 2 millimeters thick, without ulceration. Cancer is found in 1 to 3 lymph nodes by sentinel lymph node biopsy.
- Stage IIIB:
  - (1) It is not known where the cancer began or the primary tumor can no longer be seen, and one of the following is true:
    - cancer is found in 1 lymph node by physical exam or imaging tests; or
    - there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
      or
  - (2) The tumor is not more than 1 millimeter thick, with ulceration, or not more than 2 millimeters thick, without ulceration, and one of the following is true:
    - cancer is found in 1 to 3 lymph nodes by physical exam or imaging tests; or
    - there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
      or
  - (3) The tumor is more than 1 but not more than 2 millimeters thick, with ulceration, or more than 2 but not more than 4 millimeters thick, without ulceration, and one of the following is true:
    - cancer is found in 1 to 3 lymph nodes; or
    - there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
- Stage IIIC:
  - (1) It is not known where the cancer began, or the primary tumor can no longer be seen. Cancer is found:
    - in 2 or 3 lymph nodes; or
    - in 1 lymph node and there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; or
    - in 4 or more lymph nodes, or in any lymph nodes that are matted together; or
    - in 2 or more lymph nodes and/or in any lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
      or
  - (2) The tumor is not more than 2 millimeters thick, with or without ulceration, or not more than 4 millimeters thick, without ulceration. Cancer is found:
    - in 1 lymph node and there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin; or
    - in 4 or more lymph nodes, or in any lymph nodes that are matted together; or
    - in 2 or more lymph nodes and/or in any lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
      or
  - (3) The tumor is more than 2 but not more than 4 millimeters thick, with ulceration, or more than 4 millimeters thick, without ulceration. Cancer is found in 1 or more lymph nodes and/or in any lymph nodes that are matted together. There may be microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
    or
  - (4) The tumor is more than 4 millimeters thick, with ulceration. Cancer is found in 1 or more lymph nodes and/or there are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.
- Stage IIID: The tumor is more than 4 millimeters thick, with ulceration. Cancer is found:
  - in 4 or more lymph nodes, or in any lymph nodes that are matted together; or
  - in 2 or more lymph nodes and/or in any lymph nodes that are matted together. There are microsatellite tumors, satellite tumors, and/or in-transit metastases on or under the skin.

#### Stage IV (also called stage 4) melanoma

In stage IV, the cancer has spread to other parts of the body, such as the lung, liver, brain, spinal cord, bone, soft tissue (including muscle), digestive tract, and/or distant lymph nodes. Cancer may have spread to places in the skin far away from where it first started.

Stage IV melanoma is also called metastatic melanoma. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if melanoma spreads to the lung, the cancer cells in the lung are actually melanoma cells. The disease is called metastatic melanoma, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

Stage IV melanoma. Cancer has spread to other parts of the body, such as the brain, spinal cord, lung, liver, gastrointestinal (GI) tract, bone, muscle, and/or distant lymph nodes. Cancer may have spread to places in the skin far away from where it first started.

Stage IV melanoma; drawing shows other parts of the body where melanoma may spread, including the brain, spinal cord, lung, liver, gastrointestinal (GI) tract, bone, muscle, and distant lymph nodes. An inset shows cancer cells spreading through the blood and lymph system to another part of the body where a metastatic tumor has formed.

### Melanoma can recur (come back) after it has been treated.

Recurrent melanoma is melanoma that has come back after it has been treated. If melanoma comes back, it may come back in the area where it first started or in other parts of the body, such as the lungs or liver. Tests will help determine where in the body the cancer has returned. The type of treatment that you have for recurrent melanoma will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for people with melanoma.
- The following types of treatment are used:
  - Surgery
  - Chemotherapy
  - Radiation therapy
  - Immunotherapy
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for melanoma may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for people with melanoma.

Different types of treatment are available for people with melanoma. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for people with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. People may want to think about taking part in a clinical trial. Some clinical trials are open only to people who have not started treatment.

### The following types of treatment are used:

#### Surgery

Surgery to remove the tumor is the primary treatment for all stages of melanoma. A wide local excision is used to remove the melanoma and some of the normal tissue around it. Skin grafting (taking skin from another part of the body to replace the skin that is removed) may be done to cover the wound caused by surgery.

Sometimes, it is important to know whether cancer has spread to the lymph nodes. Lymph node mapping and sentinel lymph node biopsy are done to check for cancer in the sentinel lymph node, which is the first lymph node the cancer is likely to spread to from the primary tumor.

If only a small amount of cancer cells are found during a sentinel lymph node biopsy, active surveillance with ultrasound may be recommended instead of more surgery.

After the doctor removes all the melanoma that can be seen at the time of the surgery, some people may be given chemotherapy after surgery to kill any cancer cells that are left. Chemotherapy given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

Surgery to remove cancer that has spread to the lymph nodes, lung, digestive tract, bone, or brain may be done to improve quality of life by controlling symptoms.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy).

One type of regional chemotherapy is hyperthermic isolated limb perfusion. With this method, anticancer drugs go directly to the arm or leg the cancer is in. The flow of blood to and from the limb is temporarily stopped with a tourniquet. A warm solution with the anticancer drug is put directly into the blood of the limb. This gives a high dose of drugs to the area where the cancer is.

The way the chemotherapy is given depends on the type and stage of the cancer being treated.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. External radiation therapy is used to treat melanoma and may also be used as palliative therapy to relieve symptoms and improve quality of life.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Immunotherapy drugs used to treat melanoma include:

- atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab)
- interleukin-2
- ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)
- nivolumab and relatimab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-relatlimab-rmbw)

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

#### Targeted therapy

Targeted therapy uses drugs or other substances to identify and attack specific cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Targeted therapies used to treat melanoma include:

- binimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/binimetinib)
- cobimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/cobimetinib)
- dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib)
- encorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/encorafenib)
- trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib)
- vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### New types of treatment are being tested in clinical trials.

#### Vaccine therapy

Vaccine therapy is a cancer treatment that uses a substance or group of substances to stimulate the immune system to find the tumor and kill it. Vaccine therapy is being studied in the treatment of stage III melanoma that can be removed by surgery.

### Treatment for melanoma may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Stage 0 (Melanoma in Situ)

Treatment of stage 0 is usually surgery to remove the area of abnormal cells and a small amount of normal tissue around it.

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage I Melanoma

Treatment of stage I melanoma is usually surgery to remove the tumor and some of the normal tissue around it, with or without lymph node mapping and sentinel lymph node biopsy.

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Melanoma

Treatment of stage II melanoma may include:

- surgery to remove the tumor and some of the normal tissue around it, with lymph node mapping and sentinel lymph node biopsy. If cancer is found in the sentinel lymph node, more lymph nodes may be removed.
- surgery followed by immunotherapy with pembrolizumab if there is a high risk that the cancer will come back

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Melanoma That Can Be Removed By Surgery

Treatment of stage III melanoma that can be removed by surgery may include:

- immunotherapy with pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) before surgery
- surgery to remove the tumor and some of the normal tissue around it, with or without skin grafting to cover the wound caused by surgery. Sometimes lymph node mapping and sentinel lymph node biopsy are done to check for cancer in the lymph nodes at the same time as the surgery to remove the tumor. If cancer is found in the sentinel lymph node, more lymph nodes may be removed.
- surgery followed by immunotherapy with nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab), pembrolizumab, or ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab) if there is a high risk that the cancer will come back
- surgery followed by targeted therapy with dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib) and trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib) if there is a high risk that the cancer will come back

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Melanoma That Cannot Be Removed By Surgery, Stage IV Melanoma, and Recurrent Melanoma

Treatment of stage III melanoma that cannot be removed by surgery, stage IV melanoma, and recurrent melanoma may include:

- immunotherapy with pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab), nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab), ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab), interleukin-2 (IL-2), nivolumab and relatimab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab-and-relatlimab-rmbw), or atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab), given alone or in combination
- targeted therapy with dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib), trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib), vemurafenib (https://www.cancer.gov/about-cancer/treatment/drugs/vemurafenib), cobimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/cobimetinib), encorafenib (https://www.cancer.gov/about-cancer/treatment/drugs/encorafenib), binimetinib (https://www.cancer.gov/about-cancer/treatment/drugs/binimetinib), given alone or in combination
- oncolytic virus therapy (talimogene laherparepvec (https://www.cancer.gov/about-cancer/treatment/drugs/talimogenelaherparepvec)) injected into the tumor
- palliative therapy to relieve symptoms and improve the quality of life:
  - chemotherapy
  - surgery to remove lymph nodes or tumors in the lung, digestive tract, bone, or brain
  - radiation therapy to the brain, spinal cord, or bone

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Melanoma

For more information from the National Cancer Institute about melanoma:

- Skin Cancer (Including Melanoma) Home Page (https://www.cancer.gov/types/skin)
- Skin Cancer Prevention
- Skin Cancer Screening
- Sentinel Lymph Node Biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet)
- Drugs Approved for Melanoma (https://www.cancer.gov/about-cancer/treatment/drugs/melanoma)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Moles to Melanoma: Recognizing the ABCDE Features (https://analysistools.nci.nih.gov/nevustool/)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of melanoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Melanoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/patient/melanoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389388]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).